# Cancer Prevention Overview (PDQ®)

Patient Version

This PDQ cancer information summary has current information about cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What Is Prevention?

Cancer prevention is action taken to lower the chance of getting cancer. In 2025, about 2 million people will be diagnosed with cancer in the United States. In addition to the physical problems and emotional distress caused by cancer, the high costs of care are also a burden to patients, their families, and to the public. By preventing cancer, the number of new cases of cancer is lowered. Hopefully, this will reduce the burden of cancer and lower the number of deaths caused by cancer.

Cancer is not a single disease but a group of related diseases. Many things in our genes, our lifestyle, and the environment around us may increase or decrease our risk of getting cancer.

Scientists are studying many different ways to help prevent cancer, including:

- Ways to avoid or control things known to cause cancer.
- Changes in diet and lifestyle.
- Finding precancerous conditions early. Precancerous conditions are conditions that may become cancer.
- Chemoprevention (medicines to treat a precancerous condition or to keep cancer from starting).
- Risk-reducing surgery.

## Carcinogenesis

Key Points for This Section
- Carcinogenesis is the process in which normal cells turn into cancer cells.
- Changes (mutations) in genes occur during carcinogenesis.

### Carcinogenesis is the process in which normal cells turn into cancer cells.

Carcinogenesis is the series of steps that take place as a normal cell becomes a cancer cell. Cells are the smallest units of the body and they make up the body's tissues. Each cell contains genes that guide the way the body grows, develops, and repairs itself. There are many genes that control whether a cell lives or dies, divides (multiplies), or takes on special functions, such as becoming a nerve cell or a muscle cell.

### Changes (mutations) in genes occur during carcinogenesis.

Changes (mutations) in genes can cause normal controls in cells to break down. When this happens, cells do not die when they should and new cells are produced when the body does not need them. The buildup of extra cells may cause a mass (tumor) to form.

Tumors can be benign or malignant (cancerous). Malignant tumor cells invade nearby tissues and spread to other parts of the body. Benign tumor cells do not invade nearby tissues or spread.

## Risk Factors

Key Points for This Section
- Factors that are known to increase the risk of cancer
  - Cigarette smoking and tobacco use
  - Infections
  - Radiation
  - Immunosuppressive medicines after organ transplant
- Factors that may affect the risk of cancer
  - Diet
  - Alcohol
  - Physical activity
  - Obesity
  - Diabetes
  - Environmental risk factors

Scientists study risk factors and protective factors to find ways to prevent new cancers from starting. Anything that increases your chance of developing cancer is called a cancer risk factor; anything that decreases your chance of developing cancer is called a cancer protective factor.

Some risk factors for cancer can be avoided, but many cannot. For example, both smoking and inheriting certain genes are risk factors for some types of cancer, but only smoking can be avoided. Risk factors that a person can control are called modifiable risk factors.

Many other factors in our environment, diet, and lifestyle may cause or prevent cancer. This summary reviews only the major cancer risk factors and protective factors that can be controlled or changed to reduce the risk of cancer. Risk factors that are not described in the summary include certain sexual behaviors, the use of estrogen, and being exposed to certain substances at work or to certain chemicals.

### Factors that are known to increase the risk of cancer

#### Cigarette smoking and tobacco use

Tobacco use is strongly linked to an increased risk for many kinds of cancer. Smoking cigarettes is the leading cause of the following types of cancer:

- acute myelogenous leukemia (AML)
- bladder cancer
- cervical cancer
- esophageal cancer
- kidney cancer
- lung cancer
- oral cavity cancer
- pancreatic cancer
- stomach cancer

Not smoking or quitting smoking lowers the risk of getting cancer and dying from cancer. Scientists believe that cigarette smoking causes about 30% of all cancer deaths in the United States.

To learn more, visit the following PDQ summaries:

- Lung Cancer Prevention
- Lung Cancer Screening
- Cigarette Smoking: Health Risks and How to Quit

#### Infections

Certain viruses and bacteria are able to cause cancer. Examples of cancer-causing viruses and bacteria include:

- Human papillomavirus (HPV) increases the risk for cancers of the cervix, penis, vagina, anus, and oropharynx.
- Hepatitis B and hepatitis C viruses increase the risk for liver cancer.
- Epstein-Barr virus increases the risk for Burkitt lymphoma.
- Helicobacter pylori increases the risk for gastric cancer.

Two vaccines to prevent infection by cancer-causing agents have been developed and approved by the U.S. Food and Drug Administration (FDA). One is a vaccine to prevent infection with hepatitis B virus. The other protects against infection with strains of HPV that cause cervical cancer. Scientists continue to work on vaccines against infections that cause cancer.

To learn more, visit the following PDQ summaries:

- Cervical Cancer Causes, Risk Factors, and Prevention (https://www.cancer.gov/types/cervical/causes-risk-prevention)
- Cervical Cancer Screening (https://www.cancer.gov/types/cervical/screening)
- Liver Cancer Causes, Risk Factors, and Prevention (https://www.cancer.gov/types/liver/what-is-liver-cancer/causes-risk-factors)
- Stomach Cancer Causes and Risk Factors (https://www.cancer.gov/types/stomach/causes-risk-factors)
- Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention

#### Radiation

Being exposed to radiation is a known cause of cancer. There are two main types of radiation linked with an increased risk of cancer:

- ultraviolet radiation from sunlight, the main cause of nonmelanoma skin cancers
- ionizing radiation including:
  - medical radiation from tests to diagnose cancer such as x-rays, CT scans, fluoroscopy, and nuclear medicine scans
  - radon gas in our homes

Scientists believe that ionizing radiation causes leukemia, thyroid cancer, and breast cancer in women. Ionizing radiation may also be linked to myeloma and cancers of the lung, stomach, colon, esophagus, bladder, and ovary. Being exposed to radiation from diagnostic x-rays increases the risk of cancer in patients and x-ray technicians. Diagnostic radiation in children and adolescents has been linked with a higher risk of cancers at a young age.

The growing use of CT scans over the last 20 years has increased exposure to ionizing radiation. The risk of cancer also increases with the number of CT scans a patient has and the radiation dose used each time.

To learn more, visit the following PDQ summaries:

- Breast Cancer Prevention
- Breast Cancer Screening
- Skin Cancer Prevention
- Lung Cancer Prevention

#### Immunosuppressive medicines after organ transplant

Immunosuppressive medicines are used after an organ transplant. These medicines stop a transplanted organ from being rejected by decreasing the body's immune response. Immunosuppressive medicines are linked to an increased risk of cancer because they lower the body's ability to keep cancer from forming. The risk of cancer, especially cancer caused by a virus, is higher in the first 6 months after organ transplant, but the risk lasts for many years.

### Factors that may affect the risk of cancer

#### Diet

The foods that you eat on a regular basis make up your diet. Diet is being studied as a risk factor for cancer. It is hard to study the effects of diet on cancer because a person's diet includes foods that may protect against cancer and foods that may increase the risk of cancer.

It is also hard for people who take part in the studies to keep track of what they eat over a long period of time. This may explain why studies have different results about how diet affects the risk of cancer.

Some studies have shown that a diet high in fat, proteins, calories, and red meat increases the risk of colorectal cancer, but other studies have not shown this.

It is not known if a diet low in fat and high in fiber, fruits, and vegetables lowers the risk of colorectal cancer.

#### Alcohol

Studies have shown that drinking alcohol is linked to an increased risk of the following types of cancers:

- oral cancer
- esophageal cancer
- breast cancer
- colorectal cancer (in men)

Drinking alcohol may also increase the risk of liver cancer and female colorectal cancer.

To learn more, visit the following PDQ summaries:

- Breast Cancer Prevention
- Colorectal Cancer Prevention
- Lung Cancer Prevention
- Esophageal Cancer Prevention
- Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention
- Liver Cancer Causes, Risk Factors, and Prevention (https://www.cancer.gov/types/liver/what-is-liver-cancer/causes-risk-factors)

#### Physical activity

Studies show that people who are physically active have a lower risk of certain cancers than those who are not. It is not known if physical activity itself is the reason for this.

Some studies show that physical activity protects against postmenopausal breast cancer and endometrial cancer.

To learn more, visit the following PDQ summaries:

- Breast Cancer Prevention
- Colorectal Cancer Prevention
- Endometrial Cancer Prevention

#### Obesity

Studies show that obesity is linked to a higher risk of the following types of cancer:

- postmenopausal breast cancer
- colorectal cancer
- endometrial cancer
- esophageal cancer
- kidney cancer
- pancreatic cancer

Some studies show that obesity is also a risk factor for gallbladder cancer and liver cancer.

Studies have shown that people who lose weight decrease their risk of these cancers.

To learn more, visit the following PDQ summaries:

- Breast Cancer Prevention
- Colorectal Cancer Prevention
- Endometrial Cancer Prevention
- Lung Cancer Prevention

#### Diabetes

Some studies show that diabetes may slightly increase the risk of having the following types of cancer:

- bladder cancer
- breast cancer in women
- colorectal cancer
- endometrial cancer
- liver cancer
- lung cancer
- oral cancer
- oropharyngeal cancer
- ovarian cancer
- pancreatic cancer

Diabetes and cancer share some of the same risk factors. These risk factors include:

- being older
- having obesity
- smoking
- not eating a healthy diet
- not exercising

Because diabetes and cancer share these risk factors, it is hard to know whether the risk of cancer is increased more by diabetes or by these risk factors.

Studies are being done to see how medicine that is used to treat diabetes affects cancer risk.

#### Environmental risk factors

Being exposed to chemicals and other substances in the environment has been linked to some cancers:

- Links between air pollution and cancer risk have been found. These include links between lung cancer and secondhand tobacco smoke, outdoor air pollution, and asbestos.
- Drinking water that contains a large amount of arsenic has been linked to skin, bladder, and lung cancers.

Studies have been done to see if pesticides and other pollutants increase the risk of cancer. The results of those studies have been unclear because other factors can change the results of the studies.

## Interventions That Are Known to Lower Cancer Risk

Key Points for This Section
- Chemoprevention is being studied in people who have a high risk of developing cancer.
- Studies have shown that weight loss surgery lowers cancer risk.
- Other types of surgery can help lower the risk of cancer.

An intervention is a treatment or action taken to prevent or treat disease, or improve health in other ways. Many studies are being done to find ways to keep cancer from starting or coming back.

### Chemoprevention is being studied in people who have a high risk of developing cancer.

Chemoprevention is the use of substances to lower the risk of cancer, or keep it from recurring. The substances may be natural or made in the laboratory. Some chemopreventive agents are tested in people who are at high risk for a certain type of cancer. The risk may be because of a precancerous condition, family history, or lifestyle factors.

Taking one of the following agents may lower the risk of cancer:

- Selective estrogen receptor modulators (SERMs) such as tamoxifen or raloxifene have been shown to reduce the risk of breast cancer in women at high risk. SERMs may cause side effects, such as hot flashes, so they are not often used for prevention of cancer. Learn more at Breast Cancer Prevention.
- Finasteride has been shown to lower the risk of prostate cancer. Learn more at Prostate Cancer Prevention.
- COX-2 inhibitors may prevent colon and breast cancer. However, because COX-2 inhibitors may cause heart problems, there have not been many studies on their use to prevent cancer. Learn more at Colorectal Cancer Prevention and Breast Cancer Prevention.

### Studies have shown that weight loss surgery lowers cancer risk.

Weight loss surgery, also called bariatric surgery, is a procedure that people with obesity can have to lose weight and improve their overall health and quality of life. The surgery changes the anatomy of the stomach or changes the way the body absorbs nutrients. A person who undergoes this procedure will lose a lot of weight and as a result, will have a decreased risk of cancers linked to overweight.

To learn more about cancer prevention, visit the NCI website (https://www.cancer.gov/about-cancer/causes-prevention).

### Other types of surgery can help lower the risk of cancer.

People with changes in the BRCA1 or BRCA2 gene, a personal or family history of cancer, inherited syndromes, and other high risk factors may want to have surgery to lower their risk. It's important to have a cancer risk assessment and counseling before making this decision. The following surgeries could help lower your risk of getting certain types of cancer:

- Mastectomy is a surgery to remove the entire breast. Learn more at Breast Cancer Prevention and Genetics of Breast and Gynecologic Cancers (written for health professionals).
- Tubal ligation is a surgery to close both fallopian tubes. Learn more at Ovarian, Fallopian Tube, and Primary Peritoneal Cancer Prevention.
- Salpingectomy is a surgery to remove one or both fallopian tubes. Oophorectomy is a surgery to remove one or both ovaries. These surgeries can be done separately or together (called a salpingo-oophorectomy). Learn more at Ovarian, Fallopian Tube, and Primary Peritoneal Cancer Prevention, Breast Cancer Prevention, and Genetics of Breast and Gynecologic Cancers (written for health professionals).
- Colectomy is a surgery to remove all or part of the colon. Learn more at Genetics of Colorectal Cancer (written for health professionals).
- Gastrectomy is a surgery to remove all or part of the stomach. Learn more at Genetics of Gastric Cancer (written for health professionals).
- Thyroidectomy is a surgery to remove all or part of the thyroid. Learn more at Genetics of Endocrine and Neuroendocrine Neoplasias (written for health professionals).

## Interventions That Are Not Known to Lower Cancer Risk

Key Points for This Section
- Aspirin has not been shown to prevent most cancers.
- Vitamin and dietary supplements have not been shown to prevent cancer.
- New ways to prevent cancer are being studied in clinical trials.

### Aspirin has not been shown to prevent most cancers.

Aspirin has been studied as chemoprevention. The studies show mixed results but most have shown that aspirin does not prevent cancer. However, there is evidence that taking aspirin for long periods of time may prevent colorectal cancer in certain people. Learn more at Colorectal Cancer Prevention.

Results from a randomized trial suggest that taking aspirin may make cancer grow more quickly in the elderly, but longer follow up is needed to confirm these results.

Bleeding in the gastrointestinal tract or brain is a side effect of aspirin. Even though aspirin has not been shown to reduce the risk of most cancers, it has many uses, including helping to lower the chances of dying from heart disease. Before beginning long-term aspirin use, it is important to talk with your doctor about the related benefits and harms.

### Vitamin and dietary supplements have not been shown to prevent cancer.

An intervention is a treatment or action taken to prevent or treat disease, or improve health in other ways.

There is not enough proof that taking multivitamin and mineral supplements or single vitamins or minerals can prevent cancer. The following vitamins and mineral supplements have been studied, but have not been shown to lower the risk of cancer:

- vitamin B6
- vitamin B12
- vitamin E
- vitamin C
- beta carotene
- folic acid
- selenium
- vitamin D

The Selenium and Vitamin E Cancer Prevention Trial (SELECT) found that vitamin E taken alone increased the risk of prostate cancer. The risk continued even after the men stopped taking vitamin E. Taking selenium with vitamin E or taking selenium alone did not increase the risk of prostate cancer.

Vitamin D has also been studied to see if it has anticancer effects. Skin exposed to sunshine can make vitamin D. Vitamin D can also be consumed in the diet and in dietary supplements. Taking vitamin D in doses from 400–1100 IU/day has not been shown to lower or increase the risk of cancer.

The VITamin D and OmegA-3 TriaL (VITAL) is under way to study whether taking vitamin D (2000 IU/day) and omega-3 fatty acids from marine (oily fish) sources lowers the risk of cancer.

The Physicians' Health Study found that men who have had cancer in the past and take a multivitamin daily may have a slightly lower risk of having a second cancer.

To learn more, visit the following PDQ summaries:

- Breast Cancer Prevention
- Colorectal Cancer Prevention
- Lung Cancer Prevention
- Prostate Cancer Prevention

### New ways to prevent cancer are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Cancer Prevention Overview. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/causes-prevention/patient-prevention-overview-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389424]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).